# Childhood Laryngeal Tumors (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the treatment of childhood laryngeal cancer and papillomatosis. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board.

## What are childhood laryngeal tumors?

Childhood laryngeal tumors form in the voice box, also called the larynx. These tumors may be benign (which means they are not cancer) or cancer. Most laryngeal tumors in children are not cancer and do not spread to other tissues. Both types of tumors need treatment.

The most common type of benign laryngeal tumor is papillomatosis of the larynx. In this condition, papillomas (benign tumors that look like warts) form in the lining of the larynx. These tumors may block the airway and cause trouble breathing. They often come back after treatment and, in rare cases, may turn into cancer in the larynx or the lung.

The larynx is a part of the throat, between the base of the tongue and the trachea (windpipe). The larynx contains the vocal cords, which vibrate and make sound when air is directed against them. The sound echoes through the pharynx, mouth, and nose to make a person's voice.

There are three main parts of the larynx:

- The supraglottis is the upper part of the larynx above the vocal cords, including the epiglottis.
- The glottis is the middle part of the larynx where the vocal cords are located.
- The subglottis is the lower part of the larynx between the vocal cords and the trachea.

Anatomy of the larynx. The larynx is a part of the throat, between the base of the tongue and the trachea. The three main parts of the larynx are the supraglottis (including the epiglottis), the glottis (including the vocal cords), and the subglottis.

Anatomy of the larynx; drawing shows the epiglottis, supraglottis, vocal cord, glottis, and subglottis. Also shown are the tongue, trachea, and esophagus.

## Causes of childhood laryngeal tumors

Laryngeal cancer in children is caused by certain changes to the way cells in the larynx function, especially how they grow and divide into new cells. Often, the exact cause of these cell changes is unknown. Learn more about how cancer develops at What Is Cancer? (https://www.cancer.gov/about-cancer/understanding/what-is-cancer)

Laryngeal papillomatosis is caused by infection with low-risk HPV (human papillomavirus), most often types 6 and 11. Children can get the HPV infection that causes laryngeal papillomatosis from an infected mother during birth. Most children with an HPV infection do not develop laryngeal papillomatosis. Talk with your child's doctor if you think your child may be at risk.

Getting the HPV vaccine can help protect against HPV infection and reduce the risk of transmitting it during childbirth. Learn more about HPV Vaccines (https://www.cancer.gov/about-cancer/causes-prevention/risk/infectious-agents/hpv-vaccine-fact-sheet).

## Symptoms of childhood laryngeal tumors

Children may not have symptoms of a laryngeal tumor until the tumor has grown bigger. It's important to check with your child's doctor if your child has:

- hoarseness or a change in the voice
- trouble or pain when swallowing
- trouble breathing
- a high-pitched sound with breathing
- a lump in the neck or throat
- a sore throat
- a cough that does not go away

Infants and young children with these tumors may grow slowly and not eat well or meet developmental milestones such as sitting, walking, and talking in sentences.

These symptoms may be caused by problems other than a laryngeal tumor. The only way to know is to see your child's doctor.

## Tests to diagnose childhood laryngeal tumors

If your child has symptoms that suggest a laryngeal tumor, the doctor will need to find out if these are due to cancer or some other problem. The doctor will ask when the symptoms started and how often your child has been having them. They will also ask about your child's personal and family medical history and do a physical exam. Depending on these results, they may recommend other tests. If your child is diagnosed with a laryngeal tumor, the results of these tests will help you and your child's doctor plan treatment.

The tests used to diagnose laryngeal tumors may include:

### Oral exam

In an oral exam, a doctor or dentist checks the mouth for abnormal areas. This exam may be done while under anesthesia. The doctor or dentist will feel the entire inside of the mouth with a gloved finger and examine the area with a small long-handled mirror and lights or a fiberoptic device.

### Neck and chest x-ray

An x-ray is a type of radiation that can go through the body and make pictures of the inside of the body. A neck and chest x-ray makes pictures of the organs and bones inside the neck and chest.

### Magnetic resonance imaging (MRI)

MRI uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas in the body, such as the head and neck. This procedure is also called nuclear magnetic resonance imaging (NMRI).

### CT scan

CT scan (CAT scan) uses a computer linked to an x-ray machine to make a series of detailed pictures of areas inside the body. The pictures are taken from different angles and are used to create 3-D views of tissues and organs. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography. Learn more about Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet).

Computed tomography (CT) scan of the head and neck. The child lies on a table that slides through the CT scanner, which takes a series of detailed x-ray pictures of the inside of the head and neck.

Computed tomography (CT) scan of the head and neck; drawing shows a child lying on a table that slides through the CT scanner, which takes a series of detailed x-ray pictures of the inside of the head and neck.

### PET scan

PET scan (positron emission tomography scan) uses a small amount of radioactive sugar (also called radioactive glucose) that is injected into a vein. The PET scanner rotates around the body and makes pictures of where sugar is being used by the body. Cancer cells show up brighter in the pictures because they are more active and take up more sugar than normal cells do.

Positron emission tomography (PET) scan. The child lies on a table that slides through the PET scanner. The head rest and white strap help the child lie still. A small amount of radioactive glucose (sugar) is injected into the child's vein, and a scanner makes a picture of where the glucose is being used in the body. Cancer cells show up brighter in the picture because they take up more glucose than normal cells do.

Positron emission tomography (PET) scan; drawing shows a child lying on table that slides through the PET scanner.

### Ultrasound

Ultrasound uses high-energy sound waves (ultrasound) that bounce off internal tissues or organs and make echoes. The echoes form a picture of body tissues called a sonogram.

### Barium swallow

Barium swallow is a series of x-rays of the esophagus and stomach. For this procedure, the patient drinks a liquid that contains barium (a silver-white metallic compound). The barium coats the esophagus and stomach which helps them show up more clearly in x-rays. This procedure is also called an upper GI series.

### Biopsy

A biopsy is a procedure in which a sample of tissue is removed from the tumor so that a pathologist can view it under a microscope to check for signs of disease, such as cancer or laryngeal papillomatosis.

The sample of tissue may be removed during a procedure, such as:

- Laryngoscopy is a procedure in which the doctor checks the larynx (voice box) with a mirror or a laryngoscope to check for abnormal areas. A laryngoscope is a thin, tube-like instrument with a light and a lens for viewing the inside of the throat and voice box. It may also have a tool to remove tissue samples, which are checked under a microscope for signs of disease.
- Endoscopy is a procedure to look at organs and tissues inside the body, such as the throat, esophagus, and trachea to check for abnormal areas. An endoscope is a thin, tube-like instrument with a light and a lens for viewing that is inserted through an opening in the body, such as the mouth. A special tool on the endoscope may be used to remove samples of tissue.

### Human papillomavirus (HPV) test

An HPV test checks tissue samples from the biopsy for certain types of HPV infection that may be linked to laryngeal papillomatosis.

### Immunohistochemistry

Immunohistochemistry uses antibodies to check for certain antigens (markers) in a sample of a patient's cells or tissue. The antibodies are usually linked to an enzyme or fluorescent dye. After the antibodies bind to a specific antigen in the tissue sample, the enzyme or dye is activated, and the antigen can then be seen under a microscope. This type of test is used to help diagnose cancer and help tell one type of cancer from another type.

## Getting a second opinion

You may want to get a second opinion to confirm your child's cancer diagnosis and treatment plan. If you seek a second opinion, you will need to get medical test results and reports from the first doctor to share with the second doctor. The second doctor will review the pathology report, slides, and scans. This doctor may agree with the first doctor, suggest changes to the treatment plan, or provide more information about your child's cancer.

To learn more about choosing a doctor and getting a second opinion, visit Finding Cancer Care (https://www.cancer.gov/about-cancer/managing-care/finding-cancer-care). You can contact NCI's Cancer Information Service (https://www.cancer.gov/contact) via chat, email, or phone (both in English and Spanish) for help finding a doctor or hospital that can provide a second opinion. For questions you might want to ask at your child's appointments, visit Questions to Ask Your Doctor About Cancer (https://www.cancer.gov/about-cancer/coping/questions).

## Treatment of childhood laryngeal tumors

### Who treats children with laryngeal tumors?

A pediatric oncologist, a doctor who specializes in treating children with cancer, oversees treatment of laryngeal tumors. The pediatric oncologist works with other health care providers who are experts in treating children with cancer and who specialize in certain areas of medicine. Other specialists may include:

- pediatrician
- pediatric surgeon
- radiation oncologist
- pathologist
- ear, nose, and throat specialist
- social worker
- rehabilitation specialist
- psychologist
- child-life specialist

There are different types of treatment for children with laryngeal tumors. You and your child's care team will work together to decide on treatment. Many factors will be considered, such as your child's overall health and whether the tumor is newly diagnosed or has come back.

Your child's treatment plan will include information about the tumor, the goals of treatment, treatment options, and the possible side effects. It will be helpful to talk with your child's care team before treatment begins about what to expect. For help every step of the way, see our booklet, Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents).

### Treatment of childhood laryngeal cancer

Laser surgery uses a laser beam (a narrow beam of intense light) to destroy the cancer cells.

For laryngeal cancer that is likely to spread, external radiation therapy is also used. This treatment uses high-energy x-rays or other types of radiation to kill cancer cells or keep them from growing. Learn more about External Beam Radiation Therapy for Cancer (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/external-beam) and Radiation Therapy Side Effects (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/side-effects).

If the cancer comes back after treatment, your child's doctor will talk with you about what to expect and possible next steps. There might be treatment options that may shrink the cancer or control its growth. If there are no treatments, your child can receive care to control symptoms from cancer so they can be as comfortable as possible.

### Treatment of childhood laryngeal papillomatosis

Laser surgery, which uses a laser beam (a narrow beam of intense light) to destroy cancer cells, may be used to treat newly diagnosed papillomatosis or other benign tumors.

For laryngeal papillomatosis that comes back after being removed by laser surgery four times in one year, treatment may include:

- Immunotherapy. Immunotherapy uses the patient's immune system to fight disease.
- Laser surgery combined with targeted therapy. Targeted therapy uses drugs or other substances to block the action of specific enzymes, proteins, or other molecules involved in the growth and spread of cancer cells.

## Clinical trials

For some children, joining a clinical trial may be an option. There are different types of clinical trials for childhood cancer. For example, a treatment trial tests new treatments or new ways of using current treatments. Supportive care and palliative care trials look at ways to improve quality of life, especially for those who have side effects from cancer and its treatment.

You can use the clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials accepting participants. The search allows you to filter trials based on the type of cancer, your child's age, and where the trials are being done. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

Learn more about clinical trials, including how to find and join one, at Clinical Trials Information for Patients and Caregivers (https://www.cancer.gov/research/participate/clinical-trials).

## Follow-up care

As your child goes through treatment, they will have follow-up tests or check-ups. Some of the tests that were done to diagnose the cancer may be repeated to see how well the treatment is working. Decisions about whether to continue, change, or stop treatment may be based on the results of these tests.

Some of the tests will continue to be done from time to time after treatment has ended. The results of these tests can show if your child's condition has changed or if the cancer has recurred (come back).

## Coping with your child's cancer

When your child has cancer, every member of the family needs support. Taking care of yourself during this difficult time is important. Reach out to your child's treatment team and to people in your family and community for support. To learn more, visit Support for Families: Childhood Cancer (https://www.cancer.gov/about-cancer/coping/caregiver-support/parents) and the booklet Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents).

## Related Resources

For more childhood cancer information and other general cancer resources, visit:

- Head and Neck Cancer Home Page (https://www.cancer.gov/types/head-and-neck)
- Immunotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy)
- Targeted Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/targeted-therapies)
- About Cancer (https://www.cancer.gov/about-cancer)
- Childhood Cancers (https://www.cancer.gov/types/childhood-cancers)
- CureSearch for Children's Cancer (http://www.curesearch.org/)
- Late Effects of Treatment for Childhood Cancer
- Adolescents and Young Adults with Cancer (https://www.cancer.gov/types/aya)
- Cancer in Children and Adolescents (https://www.cancer.gov/types/childhood-cancers/child-adolescent-cancers-fact-sheet)
- For Survivors, Caregivers, and Advocates (https://cancercontrol.cancer.gov/ocs/resources/survivors.html)

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the treatment of childhood laryngeal cancer and papillomatosis. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Pediatric Treatment Editorial Board. PDQ Childhood Laryngeal Tumors. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/head-and-neck/patient/child/laryngeal-treatment-pdq. Accessed <MM/DD/YYYY>.

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).